# Bladder Cancer Treatment

Patient Version

This PDQ cancer information summary has current information about the treatment of bladder cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## What Is Bladder Cancer?

Bladder cancer occurs when cells in the bladder start to grow without control. The bladder is a hollow, balloon-shaped organ in the lower part of the abdomen that stores urine.

The bladder has a muscular wall that allows it to get larger to store urine made by the kidneys and to shrink to squeeze urine out of the body. There are two kidneys, one on each side of the backbone, above the waist. The bladder and kidneys work together to remove toxins and wastes from your body through urine:

- Tiny tubules in the kidneys filter and clean the blood.
- These tubules take out waste products and make urine.
- The urine passes from each kidney through a long tube called a ureter into the bladder.
- The bladder holds the urine until it passes through a tube called the urethra and leaves the body.

Anatomy of the male urinary system (left panel) and female urinary system (right panel) showing the kidneys, ureters, bladder, and urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel). Urine is made in the renal tubules and collects in the renal pelvis of each kidney. The urine flows from the kidneys through the ureters to the bladder. The urine is stored in the bladder until it leaves the body through the urethra.

Anatomy of the male urinary system (left panel) and female urinary system (right panel); two-panel drawing showing the right and left kidneys, the ureters, the bladder filled with urine, and the urethra. The inside of the left kidney shows the renal pelvis. An inset shows the renal tubules and urine. Also shown are the prostate and penis (left panel) and the uterus (right panel).

### Types of bladder cancer

Urothelial carcinoma (also called transitional cell carcinoma) is cancer that begins in the urothelial cells, which line the urethra, bladder, ureters, renal pelvis, and some other organs. Almost all bladder cancers are urothelial carcinomas.

Urothelial cells are also called transitional cells because they change shape. These cells are able to stretch when the bladder is full of urine and shrink when it is emptied.

Other types of bladder cancer are rare:

- Squamous cell carcinoma is cancer that begins in squamous cells (thin, flat cells lining the inside of the bladder). This type of cancer may form after long-term irritation or infection with a tropical parasite called schistosomiasis, which is common in Africa and the Middle East but rare in the United States. When chronic irritation occurs, transitional cells that line the bladder can gradually change to squamous cells.
- Adenocarcinoma is cancer that begins in glandular cells that are found in the lining of the bladder. Glandular cells in the bladder make mucus and other substances.
- Small cell carcinoma of the bladder is cancer that begins in neuroendocrine cells (nerve-like cells that release hormones into the blood in response to a signal from the nervous system).

There are other ways to describe bladder cancer:

- Non-muscle-invasive bladder cancer is cancer that has not reached the muscle wall of the bladder. Most bladder cancers are non-muscle-invasive.
- Muscle-invasive bladder cancer is cancer that has spread through the lining of the bladder and into the muscle wall of the bladder or beyond it.

### Learn more about bladder cancer

Symptoms (https://www.cancer.gov/types/bladder/symptoms)

Many bladder cancer symptoms are also seen with other less serious conditions. These are the warning signs you shouldn’t ignore.

Causes and Risk Factors (https://www.cancer.gov/types/bladder/causes-risk-factors)

Using tobacco, especially smoking cigarettes, is a major risk factor for bladder cancer. Learn about tobacco use and other risk factors for bladder cancer and what you can do to lower your risk.

Screening (https://www.cancer.gov/types/bladder/screening)

Learn about bladder cancer screening tests for people at high risk.

Diagnosis (https://www.cancer.gov/types/bladder/diagnosis)

Learn about the tests that are used to diagnose and stage bladder cancer.

Prognosis and Survival Rates (https://www.cancer.gov/types/bladder/survival)

Learn about bladder cancer survival rates and why this statistic doesn't predict exactly what will happen to you.

Stages (https://www.cancer.gov/types/bladder/stages)

Stage refers to the extent of your cancer, such as how large the tumor is and if it has spread. Learn about bladder cancer stages, an important factor in deciding your treatment plan.

Treatment (https://www.cancer.gov/types/bladder/treatment)

Learn about the different ways bladder cancer can be treated.

Coping and Support (https://www.cancer.gov/types/bladder/coping)

Coping with bladder cancer and the side effects of treatment can feel overwhelming. Learn about resources to help you cope and gain a sense of control.

Childhood Bladder Cancer (https://www.cancer.gov/types/bladder/childhood)

Childhood bladder cancer is a very rare type of cancer that forms in the tissues of the bladder. Learn about the symptoms of bladder cancer in children, and how it is diagnosed and treated.

## Bladder Cancer Causes and Risk Factors

Bladder cancer is caused by certain changes in how bladder cells function, especially how they grow and divide into new cells. There are many risk factors for bladder cancer, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to bladder cancer. To learn more about how cancer develops, see What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Some risk factors for bladder cancer, like using tobacco, can be changed. Risk factors also include things people cannot change, like their age and family history. It's important to learn about risk factors for bladder cancer because it can help you make choices that might lower your risk of getting it.

### Risk factors for bladder cancer

In the United States, bladder cancer occurs more often in men than in women, and more often in White individuals than in Black individuals. Bladder cancer can be diagnosed at any age, but the risk increases as a person gets older.

Using tobacco, especially smoking cigarettes, is a major risk factor for bladder cancer. Tobacco contains harmful chemicals called carcinogens. When you use tobacco, these chemicals get absorbed into the bloodstream, are filtered by the kidneys, and then collect in the urine. This exposes your bladder to high levels of these chemicals, which can damage the DNA in the cells lining your bladder. Learn about different tools to help you quit smoking and how to use them (https://smokefree.gov/).

Other risk factors for bladder cancer include

- having a family history of bladder cancer
- having certain changes in the genes that are linked to bladder cancer, such as HRAS, RB1, PTEN/MMAC1, NAT2, and GSTM1
- being exposed to paints, dyes, metals, or petroleum products in the workplace
- past treatment with radiation therapy to the pelvis or with certain anticancer drugs, such as cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide) or ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
- taking the Chinese herb Aristolochia fangchi
- drinking water from a well that has high levels of arsenic
- drinking water that has been treated with chlorine
- having a bladder infection caused by a parasite called Schistosoma haematobium, which is common in Africa and the Middle East but rare in the United States
- using urinary catheters for a long time

Having one or more of these risk factors does not necessarily mean you will get bladder cancer. Many people with risk factors never develop bladder cancer, while others with no known risk factors do. Talk with your doctor if you think you might be at risk of bladder cancer. Bladder cancer screening (https://www.cancer.gov/types/bladder/screening) options may be available to you.

## Bladder Cancer Symptoms

The symptoms of bladder cancer can vary from person to person. The most common symptom is blood in the urine, called hematuria. It’s often slightly rusty to bright red in color. You may see blood in your urine at one point, then not see it again for a while. Sometimes there are very small amounts of blood in the urine that can only be found by having a test done.

Other common symptoms of bladder cancer include

- frequent urination
- pain or burning during urination
- feeling as if you need to urinate even if your bladder isn’t full
- urinating often during the night

When the cancer has grown large or spread beyond the bladder to other parts of the body, symptoms may include

- being unable to urinate
- lower back pain on one side of the body
- pain in the abdomen
- bone pain or tenderness
- unintended weight loss and loss of appetite
- swelling in the feet
- feeling tired

It’s important to check with your doctor if you have any of these symptoms. Keep in mind that urinary tract infections, kidney or bladder stones, or other problems related to the kidney could be the cause, not cancer. Your doctor will ask you when your symptoms started and how often you’re having them. They will most likely ask you to give a urine sample as a first step in diagnosing what is causing your symptoms. To learn more, see Bladder Cancer Diagnosis (https://www.cancer.gov/types/bladder/diagnosis).

## Bladder Cancer Diagnosis

If you have symptoms or lab test results that suggest bladder cancer, your doctor will need to find out if they’re due to cancer or another condition. Your doctor may

- ask about your personal and family medical history to learn more about your symptoms and possible risk factors for bladder cancer
- ask for a sample of your urine so it can be checked in the lab for blood, abnormal cells, or infection
- do a physical exam, which for women, may include a pelvic exam, to check for signs of cancer

Depending on your symptoms, medical history, and results of your urine lab tests and physical exam, your doctor may recommend more tests to find out if you have bladder cancer, and if so, its extent (stage).

### Tests to diagnose bladder cancer

The following tests and procedures are used to diagnose bladder cancer. The results will also help you and your doctor plan treatment.

#### Cystoscopy

Cystoscopy is a procedure in which the doctor looks inside the bladder and urethra (the tube that carries urine out of your body) to check for abnormal areas. A cystoscope is slowly inserted through the urethra into the bladder to allow the doctor to see inside. A cystoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove very small bladder tumors or tissue samples for biopsy. Cystoscopy helps to diagnose, and sometimes treat, bladder cancer and other conditions.

Cystoscopy. A cystoscope (a thin, tube-like instrument with a light and a lens for viewing) is inserted through the urethra into the bladder. Fluid is used to fill the bladder. The doctor looks at an image of the inner wall of the bladder on a computer monitor to check for abnormal areas.

Cystoscopy; drawing shows a side view of the lower pelvis containing the bladder, uterus, vagina, rectum, and anus. A cystoscope (a thin, tube-like instrument with a light and a lens for viewing) is shown passing through the urethra and into the bladder. Fluid is used to fill the bladder. An inset shows a woman lying on an examination table with her knees bent and legs apart. She is covered by a drape. The doctor is looking at an image of the inner wall of the bladder on a computer monitor to check for abnormal areas.

#### Biopsy

A biopsy is usually done during a cystoscopy procedure. Biopsy is a procedure in which a sample of cells or tissue is removed from the bladder so that a pathologist can view it under a microscope to check for signs of cancer. It may be possible to remove the entire tumor at the time of the biopsy.

Talk with your doctor to learn what to expect during and after your cystoscopy and biopsy. Some people have blood in the urine or discomfort and a burning sensation while urinating for a day or two.

To learn about the type of information that can be found in a pathologist’s report about the cells or tissue removed during a biopsy, see Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet).

#### Computed tomography (CT) urogram or intravenous pyelogram (IVP)

CT urogram is a test that takes a CT scan of the urinary tract using a contrast dye injected into a vein. To begin the procedure, a CT machine takes a series of detailed pictures of the kidneys. The contrast dye is then injected, and another CT scan of the kidneys, bladder, and ureters is done. About 10 minutes later, a final scan is taken as the contrast dye drains from the kidneys into the bladder. CT urogram also captures detailed pictures of nearby bones, soft tissues, and blood vessels. This allows the doctor to see how well your urinary tract is working and to check for signs of disease.

IVP is an x-ray imaging test of your urinary tract. After a contrast dye is injected into a vein, a series of x-ray pictures of the kidneys, ureters, and bladder are taken to find out if cancer is present in these organs. As the contrast dye moves through the kidneys, ureters, and bladder, more x-ray pictures are taken at specific times. This allows your doctor to see how well your urinary tract is working and to check for signs of disease.

#### Urine tumor marker test

Urinary tumor markers are substances found in the urine that are either made by bladder cancer cells or that the body makes in response to bladder cancer. For this test, a sample of urine is checked in the lab to detect the presence of these substances. Urine tumor marker tests may be used to help diagnose some types of bladder cancer.

### Tests to stage bladder cancer

If you’re diagnosed with bladder cancer, you will be referred to a urologic oncologist. This is a doctor who specializes in diagnosing and treating cancers of the male and female urinary tract and the male reproductive organs. They will recommend tests to determine the extent of cancer. Sometimes the cancer is only in the bladder. Or, it may have spread from the bladder to other parts of the body. The process of learning the extent of cancer in the body is called staging. It is important to know the stage of the bladder cancer to plan treatment.

For information about a specific stage of bladder cancer, see Bladder Cancer Stages (https://www.cancer.gov/types/bladder/stages).

The following imaging tests may be used to determine the bladder cancer stage.

#### Computed tomography (CT) scan

A CT scan uses a computer linked to an x-ray machine to make a series of detailed x-ray pictures of areas inside the body from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly.

#### Magnetic resonance imaging (MRI)

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the bladder. This procedure is also called nuclear magnetic resonance imaging. Images may be taken at three different times after the dye is injected, to get the best picture of abnormal areas in the bladder. This is called triple-phase MRI.

#### Chest x-ray

A chest x-ray is an x-ray of the organs and bones inside the chest. An x-ray is a type of high-energy radiation that can go through the body and onto film, making a picture of areas inside the chest.

#### Bone scan

A bone scan is a procedure that checks to see if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.

### Getting a second opinion

Some people may want to get a second opinion to confirm their bladder cancer diagnosis and treatment plan. If you choose to seek a second opinion, you will need to get important medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans before giving a recommendation. The doctor who gives the second opinion may agree with your first doctor, suggest changes or another approach, or provide more information about your cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI’s Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, see Questions to Ask Your Doctor (https://www.cancer.gov/about-cancer/coping/questions).

## Bladder Cancer Prognosis and Survival Rates

If you’ve been diagnosed with bladder cancer, you may have questions about how serious the cancer is and your chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis for bladder cancer depends on many factors:

- the stage of the cancer, including whether the cancer
  - has not reached the muscle wall of the bladder (called non-muscle-invasive or superficial bladder cancer) or
  - has spread through the inner lining of the bladder and into the muscle wall of the bladder or beyond it (called muscle-invasive bladder cancer or invasive bladder cancer)
- the type of bladder cancer
- whether the cancer is low grade or high grade
- the patient’s age and general health

For non-muscle-invasive bladder cancer, prognosis also depends on whether

- there are many tumors or large tumors
- the cancer has grown into the connective tissue next to the lining of the bladder
- the cancer has come back after treatment

Non-muscle-invasive bladder cancer can often be cured.

For muscle-invasive bladder cancer, prognosis also depends on whether carcinoma in situ is also present.

### Survival rates for bladder cancer

Doctors estimate bladder cancer prognosis by using statistics collected over many years from people with bladder cancer. One statistic that is commonly used in making a prognosis is the 5-year relative survival rate. The 5-year relative survival rate tells you what percent of people with the same type and stage of bladder cancer are alive 5 years after their cancer was diagnosed, compared with people in the overall population. For example, the 5-year relative survival rate for localized bladder cancer is 71%. This means that people diagnosed with localized bladder cancer are 71% as likely as someone who does not have bladder cancer to be alive 5 years after diagnosis.

The 5-year relative survival rates for bladder cancer are as follows:

- 97% for carcinoma in situ of the bladder alone (abnormal cells found in the tissue lining the inside of the bladder)
- 71% for localized bladder cancer (cancer is in the bladder only)
- 39% for regional bladder cancer (cancer has spread beyond the bladder to nearby lymph nodes or organs)
- 8% for metastatic bladder cancer (cancer has spread beyond the bladder to a distant part of the body)

Learn more about statistics for bladder cancer from our Cancer Stat Facts Collection. (https://seer.cancer.gov/statfacts/html/urinb.html)

### Understanding survival rate statistics

Because survival statistics are based on large groups of people, they cannot be used to predict exactly what will happen to you. The doctor who knows the most about your situation is in the best position to discuss these statistics and talk with you about your prognosis. It is important to note the following when reviewing survival statistics:

- No two people are entirely alike, and responses to treatment can vary greatly.
- Survival statistics use information collected from large groups of people who may have received different types of treatment.
- It takes several years to see the effect of newer and better treatments, so these effects may not be reflected in current survival statistics.

To learn more about survival statistics and to see videos of patients and their doctors exploring their feelings about prognosis, see Understanding Cancer Prognosis (https://www.cancer.gov/about-cancer/diagnosis-staging/prognosis).

## Bladder Cancer Stages

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. It’s important to know the stage of bladder cancer to plan treatment.

There are several different staging systems for cancer. Bladder cancer is usually staged using the TNM staging system. Your cancer may be described by this staging system in your pathology report. Based on the TNM results, a stage is assigned to your cancer, such as stage I, stage II, stage III, or stage IV (may also be written as stage 1, stage 2, stage 3, or stage 4). When talking with you about your cancer, your doctor may describe it as one of these stages.

Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

Learn about the tests and procedures doctors use to stage bladder cancer (https://www.cancer.gov/types/bladder/diagnosis#_19).

### Stage 0 (noninvasive papillary carcinoma and carcinoma in situ)

Stage 0 bladder cancer (noninvasive bladder cancer). Cancer cells are found in tissue lining the inside of the bladder but have not invaded into the bladder wall. Stage 0a (also called noninvasive papillary carcinoma) may look like long, thin growths extending into the bladder lumen (the space where urine collects). Stage 0is (also called carcinoma in situ) is a flat tumor on the tissue lining the inside of the bladder.

Stage 0 bladder cancer (noninvasive bladder cancer); drawing shows the bladder, lumen (the space where urine collects), ureter, prostate, and urethra. The first inset shows stage 0a (also called noninvasive papillary carcinoma) on the inner lining of the bladder. The second inset shows stage 0is (also called carcinoma in situ) on the inner lining of the bladder. Also shown are the connective tissue and muscle layers of the bladder and the layer of fat around the bladder.

Stage 0 refers to noninvasive bladder cancer. This means that cancer cells are found in tissue lining the inside of the bladder but have not invaded the bladder wall. Stage 0 is divided into stages 0a and 0is, depending on the type of tumor:

- Stage 0a is also called noninvasive papillary carcinoma, which may look like long, thin growths extending into the bladder lumen (the space where urine collects). Stage 0a can be low grade or high grade, depending on how abnormal the cells look under the microscope (see the section on Bladder cancer grade (https://www.cancer.gov/types/bladder/stages#_33)).
- Stage 0is is also called carcinoma in situ, which is a flat tumor on the tissue lining the inside of the bladder. Stage 0is is always high grade (see the section on Bladder cancer grade (https://www.cancer.gov/types/bladder/stages#_33)).

Learn about treatment for stage 0 bladder cancer (https://www.cancer.gov/types/bladder/treatment/by-stage#_3).

### Stage I bladder cancer

Stage I is a form of non-muscle-invasive bladder cancer that has spread into the connective tissue but has not reached the muscle layers of the bladder.

Stage I bladder cancer (non-muscle-invasive bladder cancer). Cancer has spread into the connective tissue but has not reached the muscle layers of the bladder.

Stage I bladder cancer (non-muscle-invasive bladder cancer); drawing shows the bladder, ureter, prostate, and urethra. An inset shows cancer in the inner lining of the bladder and in the layer of connective tissue next to it. Also shown are the muscle layers of the bladder and the layer of fat around the bladder.

Learn about treatment for stage I bladder cancer (https://www.cancer.gov/types/bladder/treatment/by-stage#_9).

### Stage II bladder cancer

Stage II may also be described as muscle-invasive bladder cancer. In stage II, cancer has spread through the connective tissue into the muscle layers of the bladder.

Stage II bladder cancer (muscle-invasive bladder cancer). Cancer has spread through the connective tissue into the muscle layers of the bladder.

Stage II bladder cancer (muscle-invasive bladder cancer); drawing shows the bladder, ureter, prostate, and urethra. An inset shows cancer in the inner lining of the bladder and in the layer of connective tissue and the muscle layers of the bladder. Also shown is the layer of fat around the bladder.

Learn about treatment for stage II bladder cancer (https://www.cancer.gov/types/bladder/treatment/by-stage#_14).

### Stage III bladder cancer

Stage III may also be described as locally advanced bladder cancer. Stage III is divided into stages IIIA and IIIB.

- In stage IIIA
  - cancer has grown all the way through the bladder muscles and bladder wall into the layer of fat surrounding the bladder and may have spread to the reproductive organs (prostate, seminal vesicles, uterus, or vagina) but has not spread to lymph nodes; or
  - cancer has spread to one lymph node in the pelvis that is not near the major arteries in the pelvis, called the common iliac arteries.
    Stage IIIA bladder cancer. Cancer (a) has grown all the way through the bladder muscles and bladder wall into the layer of fat around the bladder and may have spread to the prostate and/or seminal vesicles in men or the uterus and/or vagina in women but has not spread to lymph nodes; or (b) has spread to one lymph node in the pelvis that is not near the common iliac arteries.
    Two-panel drawing showing stage IIIA bladder cancer in a male (left panel) and a female (right panel); both panels show cancer in the bladder and in (a) the layer of fat around the bladder and (b) one lymph node in the pelvis. Also shown are the right and left common iliac arteries, the prostate (left panel), and the uterus (right panel).
- In stage IIIB, cancer has spread to more than one lymph node in the pelvis that is not near the common iliac arteries or to at least one lymph node that is near the common iliac arteries.
  Stage IIIB bladder cancer. Cancer has spread to (a) more than one lymph node in the pelvis that is not near the common iliac arteries; or (b) at least one lymph node that is near the common iliac arteries.
  Two-panel drawing showing stage IIIB bladder cancer in a male (left panel) and a female (right panel); both panels show cancer in the bladder and in (a) more than one lymph node in the pelvis that is not near the common iliac artery and (b) one lymph node near the common iliac artery. Also shown are the right and left common iliac arteries, the prostate (left panel), and the uterus (the right panel).

Learn about treatment for stage III bladder cancer (https://www.cancer.gov/types/bladder/treatment/by-stage#_14).

### Stage IV bladder cancer

Stage IV is divided into stages IVA and IVB.

- In stage IVA
  - cancer has spread to the abdominal wall or pelvic wall; or
  - cancer has spread to lymph nodes that are above the major arteries in the pelvis, called the common iliac arteries.
- In stage IVB, cancer has spread to other parts of the body, such as the lung, bone, or liver.
  Stage IVA and IVB bladder cancer. In stage IVA, cancer has spread to (a) the abdominal or pelvic wall; or (b) lymph nodes above the common iliac arteries. In stage IVB, cancer has spread to (c) other parts of the body, such as the lung, liver, or bone.
  Stage IVA and IVB bladder cancer; drawing shows cancer that has spread from the bladder to (a) the abdominal or pelvic wall and (b) lymph nodes above the common iliac arteries. Also shown is cancer that has spread to (c) other parts of the body, including the lung, liver, and bone.

Stage IV bladder cancer is also called metastatic bladder cancer. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if bladder cancer spreads to the lung, the cancer cells in the lung are actually bladder cancer cells. The disease is called metastatic bladder cancer, not lung cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

Learn about treatment for stage IV bladder cancer (https://www.cancer.gov/types/bladder/treatment/by-stage#_22).

### Bladder cancer grade

Cancer grade describes how abnormal the bladder cancer cells look under a microscope and how quickly the cancer cells are likely to grow and spread. Your doctor uses grade and other factors about your cancer, such as its stage, to form a treatment plan and in some cases, to estimate your prognosis.

- Low-grade bladder cancer cells look more like normal cells and tend to grow and spread more slowly than high-grade cancer cells.
- High-grade bladder cancer tends to grow and spread more quickly than low-grade bladder cancer. High-grade cancers usually have a worse prognosis than low-grade cancers and may need treatment right away or treatment that is more aggressive

To learn more, see Tumor Grade (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/tumor-grade).

### Recurrent bladder cancer

Recurrent bladder cancer is cancer that has recurred (come back) after it has been treated. Bladder cancer tends to recur after treatment, even when it is noninvasive at the time of diagnosis. Low-grade bladder cancer mainly recurs in the bladder lining. High-grade bladder cancer is more likely to have spread to the muscle layers or other parts of the body when it recurs. Tests will be done to help determine where the cancer has returned in your body, if it has spread, and how far. The type of treatment that you have for recurrent bladder cancer will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in Coping with Bladder Cancer (https://www.cancer.gov/types/bladder/coping) and the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

Learn about treatment for recurrent bladder cancer (https://www.cancer.gov/types/bladder/treatment/by-stage#_320).

## Bladder Cancer Treatment

Different types of treatment are available for bladder cancer. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage and grade of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

It will be helpful to talk with your cancer care team before treatment begins about what to expect. Some things you'll want to learn about include what you need to do before treatment begins, how you'll feel while going through it, and what kind of help you will need. To learn more, visit Questions to Ask Your Doctor About Your Treatment (https://www.cancer.gov/about-cancer/treatment/questions). For treatment by stage, visit Treatment of Bladder Cancer by Stage (https://www.cancer.gov/types/bladder/treatment/by-stage).

### Surgery

Surgery is the main treatment for bladder cancer. The type of surgery depends on where the cancer is located. Other treatments may be given in addition to surgery:

- Treatment given before surgery is called preoperative therapy or neoadjuvant therapy. Chemotherapy may be given before surgery to shrink the tumor and reduce the amount of tissue that needs to be removed during surgery.
- Treatment given after surgery, to lower the risk that the cancer will come back, is called adjuvant therapy. After the doctor removes all the cancer that can be seen, some patients may be given chemotherapy, radiation therapy, immunotherapy, and/or targeted therapy to kill any cancer cells that are left.

Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).

The types of surgery done to treat bladder cancer are:

#### Transurethral resection (TUR) with fulguration

During TUR with fulguration, the doctor inserts a cystoscope (a thin lighted tube) into the bladder through the urethra. A tool with a small wire loop on the end is then used to remove the cancer or to burn the tumor away with high-energy electricity. This is known as fulguration.

#### Partial cystectomy

Partial cystectomy is surgery to remove part of the bladder. This may be done for patients who have a low-grade tumor that has invaded the wall of the bladder but is limited to one area of the bladder. Because only a part of the bladder is removed, patients are able to urinate normally after recovering from this surgery. This is also called segmental cystectomy.

#### Radical cystectomy with urinary diversion

Radical cystectomy is surgery to remove the bladder and any lymph nodes and nearby organs that contain cancer. This surgery may be done when the bladder cancer invades the muscle layers or when non-muscle-invasive bladder cancer involves a large part of the bladder:

- In men, the nearby organs that are removed are the prostate and the seminal vesicles.
- In women, the uterus, the ovaries, and part of the vagina are removed.

Sometimes, when the cancer has spread outside the bladder and can't be completely removed, surgery to remove only the bladder may be done to reduce urinary symptoms caused by the cancer.

When the bladder must be removed, the surgeon performs a procedure called urinary diversion to create another way for the body to store and pass urine. It may involve redirecting urine into the colon, using catheters to drain the bladder, or making an opening in the abdomen that connects to a bag outside the body for collecting urine. To learn more, visit the National Institute of Diabetes and Digestive and Kidney Diseases page on Urinary Diversion (https://www.niddk.nih.gov/health-information/urologic-diseases/urinary-diversion).

### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Bladder cancer is sometimes treated with external beam radiation therapy. This type of radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Radiation therapy may be given alone or with other types of treatment, such as chemotherapy.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Chemotherapy may be given alone or with other types of treatment. The way the chemotherapy is given depends on the type and stage of the cancer being treated.

#### Systemic chemotherapy

Systemic chemotherapy for bladder cancer is when chemotherapy drugs are injected into a vein. When given this way, the drugs enter the bloodstream to reach cancer cells throughout the body. Systemic chemotherapy drugs that may be used to treat bladder cancer are:

- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- fluorouracil (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil) (5-FU)
- gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
- methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
- mitomycin (https://www.cancer.gov/about-cancer/treatment/drugs/mitomycin)
- paclitaxel (https://www.cancer.gov/about-cancer/treatment/drugs/paclitaxel)
- vinblastine (https://www.cancer.gov/about-cancer/treatment/drugs/vinblastinesulfate)

Combinations of these drugs may be used. Other chemotherapy drugs not listed here may also be used.

#### Intravesical chemotherapy

For bladder cancer, chemotherapy may be intravesical, meaning it is put into the bladder through a tube inserted into the urethra. Intravesical treatments flush the bladder with drugs that kill cancer cells that remain after surgery. This lowers the chance of the cancer coming back.

Mitomycin and gemcitabine are two chemotherapy drugs given as intravesical chemotherapy to treat bladder cancer. These drugs can also be given systemically.

To learn more about how chemotherapy works, how it is given, common side effects, and more, visit Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy) and Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you).

### Immunotherapy

Immunotherapy helps a person's immune system fight cancer. Your doctor may suggest biomarker tests to help predict your response to certain immunotherapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

#### Systemic immunotherapy

Systemic immunotherapy drugs used to treat urothelial cancer (a type of bladder cancer) include:

- atezolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/atezolizumab)
- avelumab (https://www.cancer.gov/about-cancer/treatment/drugs/avelumab)
- nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)

These drugs work in more than one way to kill cancer cells. They are also considered targeted therapy because they target specific changes or substances in cancer cells (visit the section on Targeted therapy (https://www.cancer.gov/types/bladder/treatment#_37)).

#### Intravesical immunotherapy

BCG (bacillus Calmette-Guérin), nadofaragene firadenovec-vncg (https://www.cancer.gov/about-cancer/treatment/drugs/nadofaragene-firadenovec-vncg), and nogapendekin alfa inbakicept-pmln (https://www.cancer.gov/about-cancer/treatment/drugs/nogapendekin-alfa-inbakicept-pmln) are intravesical immunotherapy drugs used to treat bladder cancer. They are given in a solution that is placed directly into the bladder using a catheter (thin tube). Intravesical treatments flush the bladder with drugs that kill cancer cells that remain after surgery. This lowers the chance of the cancer coming back.

nonspecific immune stimulation

Immunotherapy uses the body’s immune system to fight cancer. This animation explains one type of immunotherapy called nonspecific immune stimulation that is used to treat cancer.

YouTube (https://www.youtube.com/watch?v=zKgCtZ4Sz7w)

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy) and Immunotherapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy/side-effects).

### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells. Your doctor may suggest biomarker tests to help predict your response to certain targeted therapy drugs. Learn more about Biomarker Testing for Cancer (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Targeted therapies used to treat bladder cancer include:

- enfortumab vedotin (https://www.cancer.gov/about-cancer/treatment/drugs/enfortumabvedotin-ejfv)
- erdafitinib (https://www.cancer.gov/about-cancer/treatment/drugs/erdafitinib)
- ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab)
- sacituzumab govitecan-hziy (https://www.cancer.gov/about-cancer/treatment/drugs/sacituzumabgovitecan-hziy)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

### Clinical trials

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Follow-up care

Some of the tests that were done to diagnose or stage (https://www.cancer.gov/types/bladder/diagnosis) the cancer may be repeated. Some tests will be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests. These tests are sometimes called follow-up tests or check-ups.

## Treatment of Bladder Cancer by Stage

Bladder cancer stage and grade (https://www.cancer.gov/types/bladder/stages) are important factors in deciding the best treatment for bladder cancer. Other factors, such as your preferences and overall health, are also important.

Palliative therapy aims to relieve symptoms and improve the quality of life for people with life-threatening diseases like cancer. It is helpful at all stages of cancer. Many cancer treatments can also be used as palliative therapy to enhance comfort. Learn more about Palliative Care in Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/care-choices/palliative-care-fact-sheet).

For some people, taking part in a clinical trial of new cancer drugs or treatment combinations may be an option. To learn about clinical trials, including how to find and join one, visit Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of stages 0 and I bladder cancer

Stage 0 and stage I bladder cancer, also known as non-muscle-invasive bladder cancer (NMIBC), haven't spread to the muscle layer of the bladder. Treatment of NMIBC depends on several factors:

- the risk level of the cancer (low, intermediate, or high) for recurrence or becoming muscle-invasive
- the stage and grade of the cancer
- the size and number of tumors

The first treatment is usually a surgical procedure called transurethral resection (TUR) with fulguration to remove the tumor. Sometimes, surgery might be repeated if the first doesn't remove enough of the tumor or does not include a sample from the muscle layer. If a repeat surgery finds that the cancer has invaded the muscle layer, it will be treated as muscle-invasive bladder cancer (stage II bladder cancer or higher).

Because stage 0 and stage I bladder cancer often come back after surgery, most people receive intravesical chemotherapy with mitomycin (https://www.cancer.gov/about-cancer/treatment/drugs/mitomycin) or gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride) or intravesical BCG at the time of their first surgery. To help lower the risk of bladder cancer recurrence, your doctor may recommend you continue having intravesical BCG for up to 3 years, depending on the characteristics of the cancer. This is called maintenance therapy.

To learn more about the treatments below, visit Bladder Cancer Treatment (https://www.cancer.gov/types/bladder/treatment).

#### Treatment of low-risk bladder cancer

Low-risk bladder cancer might include small, single, low-grade tumors.

Treatment typically includes TUR with fulguration and intravesical therapy given around the time of surgery, followed by surveillance. Surveillance means closely watching your condition but not giving any treatment unless the cancer returns.

#### Treatment of intermediate-risk bladder cancer

Intermediate-risk bladder cancer might include multiple or large, slow-growing stage 0a tumors, slow-growing stage 0a tumors that recur within 1 year, a single fast-growing stage 0a tumor, or a slow-growing stage I tumor.

Treatment typically includes TUR with fulguration, followed by intravesical therapy (BCG or chemotherapy with mitomycin or gemcitabine). Depending on the characteristics of the cancer, your doctor may recommend that you continue having intravesical BCG for up to 1 year to lower the risk of recurrence. Surveillance with regular cystoscopies (bladder inspections with a camera) and possibly additional imaging tests are used to monitor for signs of cancer recurrence or progression.

#### Treatment of high-risk bladder cancer

High-risk bladder cancer might include multiple or large high-grade stage 0a tumors, the presence of carcinoma in situ (stage 0is), and fast-growing stage I tumors.

Treatment typically includes TUR with fulguration, followed by intravesical BCG therapy. Sometimes, intravesical BCG is continued for up to 3 years to lower the risk of recurrence. If you have multiple tumors or carcinoma in situ, a type of high-grade stage 0 cancer, another option is surgery to remove part or all of your bladder (cystoscopy).

#### Treatment of very high-risk bladder cancer

Very high-risk bladder cancer might include cancer that does not respond to intravesical BCG, that recurs in the urethra, or that involves cancer cells detected in the blood or lymph system near the tumor. Very high-risk bladder cancer has a greater chance of progressing to muscle-invasive disease (stage II or higher).

If you have many tumors or carcinoma in situ (a type of high-grade stage 0 cancer), partial or complete cystectomy (surgical removal of the bladder) may be an option. If you have carcinoma in situ, cannot or choose not to have a cystectomy, and BCG did not work, other options include intravesical chemotherapy, the immunotherapy drug pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab) given through a vein, or intravesical immunotherapy with nadofaragene firadenovec-vncg (https://www.cancer.gov/about-cancer/treatment/drugs/nadofaragene-firadenovec-vncg) or nogapendekin alfa inbakicept-pmln (https://www.cancer.gov/about-cancer/treatment/drugs/nogapendekin-alfa-inbakicept-pmln).

### Treatment of stages II and III bladder cancer

The two main treatments for stage II and stage III bladder cancer are radical cystectomy or a combination of radiation therapy and chemotherapy.

Radical cystectomy is surgery to remove the bladder and surrounding tissues and organs. Surgery to make a new way for urine to leave the body (called urinary diversion) will be done. Additional treatments may be given before or after surgery:

- Chemotherapy may be given before surgery to people who are well enough to tolerate it. Giving combination chemotherapy that includes cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin) before surgery has been shown to help people live longer than surgery alone.
- The immunotherapy drug nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab) may be given if the cancer has a high risk of coming back after surgery or did not respond to chemotherapy.

If you are unable or choose not to have surgery, treatment may include a combination of radiation therapy and chemotherapy, such as cisplatin and fluorouracil (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil), given at the same time. Giving chemotherapy at the same time as radiation therapy helps the radiation therapy work better.

Partial cystectomy (removal of part of the bladder) is a less common treatment for stages II and III bladder cancer.

To learn more about these treatments, visit Bladder Cancer Treatment (https://www.cancer.gov/types/bladder/treatment).

### Treatment of stage IV bladder cancer

Treatment for stage IV bladder cancer depends on whether the cancer is locally advanced or metastatic. Treatment for metastatic bladder cancer is aimed at relieving symptoms and improving quality of life while also slowing the growth and spread of the cancer.

Treatment of stage IVA (locally advanced) bladder cancer may include:

- the immunotherapy drug pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab) in combination with the targeted therapy drug enfortumab vedotin (https://www.cancer.gov/about-cancer/treatment/drugs/enfortumabvedotin-ejfv)
- the immunotherapy drug nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab) in combination with the chemotherapy drugs cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin) and gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
- the chemotherapy drugs cisplatin and gemcitabine followed by the immunotherapy drug avelumab (https://www.cancer.gov/about-cancer/treatment/drugs/avelumab)
- for people well enough to tolerate it, cisplatin-based systemic chemotherapy, such as one of the following regimens:
  - dose-dense methotrexate, vinblastine, doxorubicin, and cisplatin (MVAC) (https://www.cancer.gov/about-cancer/treatment/drugs/MVAC)
  - cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin), methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium), and vinblastine (https://www.cancer.gov/about-cancer/treatment/drugs/vinblastinesulfate) (CMV)
- pembrolizumab alone
- a cisplatin-based chemotherapy regimen followed by surgery to remove the bladder and surrounding tissues and organs (radical cystectomy) and urinary diversion or surgery alone
- radiation therapy and chemotherapy, such as cisplatin and fluorouracil (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil), given at the same time, to help the radiation therapy work better
- urinary diversion, as palliative therapy or to prevent a blockage of urine that could cause kidney damage
- surgery to remove part or all of the bladder (cystectomy) as palliative therapy

Treatment of stage IVB (metastatic) bladder cancer may include:

- the immunotherapy drug pembrolizumab in combination with the targeted therapy drug enfortumab vedotin
- the immunotherapy drug nivolumab in combination with the chemotherapy drugs cisplatin and gemcitabine
- the chemotherapy drugs cisplatin and gemcitabine followed by the immunotherapy drug avelumab
- systemic chemotherapy, such as one of the following regimens:
  - gemcitabine with either cisplatin or carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
  - dose-dense methotrexate, vinblastine, doxorubicin, and cisplatin (MVAC)
  - cisplatin, methotrexate, and vinblastine (CMV)
- an immunotherapy drug alone, such as avelumab, nivolumab, or pembrolizumab
- radiation therapy as palliative therapy
- urinary diversion, as palliative therapy or to prevent a blockage of urine that could damage the kidneys
- surgery to remove part or all of the bladder (cystectomy) as palliative therapy

To learn more about these treatments, visit Bladder Cancer Treatment (https://www.cancer.gov/types/bladder/treatment).

### Treatment of recurrent bladder cancer

Treatment of bladder cancer that has recurred (come back) depends on previous treatment and where the cancer has come back. Treatment may include:

- systemic chemotherapy, such one of the following regimens:
  - gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride) with either cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin) or carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
  - dose-dense methotrexate, vinblastine, doxorubicin, and cisplatin (MVAC) (https://www.cancer.gov/about-cancer/treatment/drugs/MVAC)
  - cisplatin, methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium), and vinblastine (https://www.cancer.gov/about-cancer/treatment/drugs/vinblastinesulfate)
- an immunotherapy drug, such as avelumab (https://www.cancer.gov/about-cancer/treatment/drugs/avelumab), nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab), or pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)
- a targeted therapy drug, such as enfortumab vedotin (https://www.cancer.gov/about-cancer/treatment/drugs/enfortumabvedotin-ejfv), erdafitinib (https://www.cancer.gov/about-cancer/treatment/drugs/erdafitinib), or ramucirumab (https://www.cancer.gov/about-cancer/treatment/drugs/ramucirumab)
- surgery for non-muscle-invasive or localized tumors, which may be followed by immunotherapy and chemotherapy
- radiation therapy as palliative therapy

To learn more about these treatments, visit Bladder Cancer Treatment (https://www.cancer.gov/types/bladder/treatment).

## Coping with Bladder Cancer

When you first learn that you have bladder cancer, you may wonder how you’re going to cope with the upcoming changes in your life. One step you can take is to be informed of the physical and emotional changes that may occur and what resources are available to help you. Talking with your health care team about your concerns can give you a greater sense of control. Family and friends can also be important sources of support.

For resources on the common physical side effects of treatment for bladder cancer, see Bladder Cancer Treatment (https://www.cancer.gov/types/bladder/treatment). For help with emotional side effects, see Emotions and Cancer (https://www.cancer.gov/about-cancer/coping/feelings).

For help after your cancer treatment has ended, see Cancer Survivorship (https://www.cancer.gov/about-cancer/coping/survivorship) and our booklet Facing Forward: Life After Cancer Treatment (https://www.cancer.gov/publications/patient-education/facing-forward).

### Adjusting after urostomy

For those who have a stoma and urostomy bag, getting used to them takes time. Some people need to learn how to use a catheter to empty their bladder, which is another big change. And if you have incontinence or problems controlling your bladder, it can be frustrating to deal with.

Know that you aren't alone in how you feel. Adjusting to these changes can be hard. But, over time, many people are able to do a lot of what they did before surgery. Support from family members and your health care team can help you get used to life after urostomy surgery. Ask your nurse for resources and support groups that may be helpful. Learn more about Patient’s Concerns About Surgery (https://www.ostomy.org/emotional-issues/).

### Self-image and sexual problems

Body changes may affect your self-image and sex life after treatment. Some treatments for bladder cancer, including chemotherapy, radiation therapy, surgery, or certain medicines, can cause short-term or long-term problems with sex. For example, having a cystectomy may affect the nerves and make it harder for men to have an erection. Women may have pain during sex or problems with lubrication and orgasm.

It’s important to discuss any issues and concerns you have about sex with your health care team before treatment. Knowing your thoughts ahead of time may help them plan your treatment.

Learn more about the sexual problems some cancer treatments can cause and ways to cope in Sexual Health Issues in Women with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-women) and Sexual Health Issues in Men with Cancer (https://www.cancer.gov/about-cancer/treatment/side-effects/sexuality-men). For help communicating your feelings, see Self-Image and Sexuality (https://www.cancer.gov/about-cancer/coping/self-image).

### The stress of follow-up care

It’s common for bladder cancer to come back, even after successful treatment. As a result, it is important for people who have been treated for bladder cancer to visit their doctor regularly to get certain follow-up exams or tests. This can be hard for a number of reasons, such as:

- Planning and scheduling these appointments can be stressful and time-consuming.
- Waiting for test results can cause anxiety and an ongoing fear of recurrence.
- The added costs of things such as copays, medicines, and parking and transportation fees only add to the stress.

For information about how to prepare for follow-up appointments, see Follow-Up Medical Care (https://www.cancer.gov/about-cancer/coping/survivorship/follow-up-care).

For tips on how to deal with the fear of cancer coming back, see the section Coping with Fear of Recurrence (https://www.cancer.gov/about-cancer/coping/survivorship/new-normal) on our New Normal page.

### Cost of cancer treatment

Cancer is one of the most costly diseases to treat in the United States. Even if you have health insurance, you may face major financial challenges and need help dealing with the costs of bladder cancer treatment. Having cancer may also make it hard for you to work and pay your bills. The problems a person has related to the cost of treatment is known as financial toxicity. For ways to cope, see Managing Costs and Medical Information (https://www.cancer.gov/about-cancer/managing-care/track-care-costs). To learn about financial toxicity and find out if you are at risk, see Financial Toxicity (Financial Distress) and Cancer Treatment.